# Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of transitional cell cancer of the renal pelvis and ureter. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Transitional Cell Cancer of the Renal Pelvis and Ureter

Key Points for This Section
- Transitional cell cancer of the renal pelvis and ureter is a type of cancer that forms in the transitional cells of the renal pelvis and ureter.
- A personal history of bladder cancer and smoking can increase the risk of transitional cell cancer of the renal pelvis and ureter.
- Signs and symptoms of transitional cell cancer of the renal pelvis and ureter include blood in the urine and back pain.
- Tests that examine the abdomen and kidneys are used to diagnose transitional cell cancer of the renal pelvis and ureter.
- After transitional cell cancer of the renal pelvis and ureter has been diagnosed, tests are done to find out if cancer cells have spread within the renal pelvis and ureter or to other parts of the body.
- Some people decide to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Transitional cell cancer of the renal pelvis and ureter is a type of cancer that forms in the transitional cells of the renal pelvis and ureter.

Transitional cells are a type of cell that lines the inside of the renal pelvis, ureters, and other organs. These cells are able to stretch when the renal pelvis or bladder is full of urine and shrink when it is emptied. Transitional cell cancer can form in the renal pelvis, the ureters, or both.

The renal pelvis is the area at the center of the kidney. It collects urine before it flows into the ureters, which are long tubes that connect the kidney to the bladder. There are two kidneys, one on each side of the backbone, above the waist. The kidneys of an adult are about 5 inches long and 3 inches wide and are shaped like a kidney bean.

The kidneys play an important role in the urinary system:

- The kidneys filter and clean the blood by taking out waste products and extra water as urine.
- The urine collects in the middle of each kidney in the renal pelvis.
- Urine passes from the renal pelvis through the ureter into the bladder.
- The bladder holds the urine until it passes through the urethra and leaves the body.

Anatomy of the male urinary system (left panel) and female urinary system (right panel) showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel). Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.

Anatomy of the male urinary system (left panel) and female urinary system (right panel); two-panel drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel).

Renal cell cancer is a more common type of kidney cancer. For more information, see Renal Cell Cancer Treatment.

### A personal history of bladder cancer and smoking can increase the risk of transitional cell cancer of the renal pelvis and ureter.

Transitional cell cancer of the renal pelvis and ureter is caused by certain changes to the way transitional cells in the renal pelvis and ureters function, especially how they grow and divide into new cells. There are many risk factors for transitional cell cancer of the renal pelvis and ureter, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to cancer. To learn more about how cancer develops, see What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Some risk factors for transitional cell cancer of the renal pelvis and ureter, like smoking, can be changed. However, risk factors may also include things you cannot change, like your personal medical history. Learning about risk factors for transitional cell cancer of the renal pelvis and ureter can help you make changes that might lower your risk of getting it.

Risk factors for transitional cell cancer of the renal pelvis and ureter include:

- having a personal history of bladder cancer
- smoking cigarettes
- taking a lot of certain pain medicines, such as phenacetin
- being exposed to certain dyes and chemicals used in making leather goods, textiles, plastics, and rubber

Having one or more of these risk factors does not mean that you will get transitional cell cancer of the renal pelvis and ureter. Many people with risk factors never develop this type of cancer, while others with no known risk factors do. Talk with your doctor if you think you might be at risk.

### Signs and symptoms of transitional cell cancer of the renal pelvis and ureter include blood in the urine and back pain.

In the early stages, there may be no signs and symptoms of transitional cell cancer of the renal pelvis and ureter. Symptoms may appear as the tumor grows and may include:

- blood in the urine
- a pain in the back that doesn't go away
- extreme tiredness
- weight loss with no known reason
- painful or frequent urination

These symptoms may be caused by transitional cell cancer of the renal pelvis and ureter or by other conditions. It’s important to check with your doctor if you have any of these symptoms to find out the cause and begin treatment if needed.

### Tests that examine the abdomen and kidneys are used to diagnose transitional cell cancer of the renal pelvis and ureter.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Urinalysis is a test to check the color of urine and its contents, such as sugar, protein, blood, and bacteria.
- Ureteroscopy is a procedure to look inside the ureter and renal pelvis to check for abnormal areas. A ureteroscope is a thin, tube-like instrument with a light and a lens for viewing. The ureteroscope is inserted through the urethra into the bladder, ureter, and renal pelvis. A tool may be inserted through the ureteroscope to take tissue samples to be checked under a microscope for signs of disease.
  A ureteroscopy is a procedure that uses a ureteroscope (a thin, tube-like instrument with a light and a lens for viewing) to look inside the ureter and renal pelvis to check for abnormal areas. The ureteroscope is inserted through the urethra into the bladder, ureter, and renal pelvis.
  Drawing of a female and male ureteroscopy showing the lower pelvis of a female, including the right and left kidneys, renal pelvis, ureter, uterus, bladder, and urethra, and the lower pelvis of a male, including the ureter, bladder, prostate, urethra, and penis. In both the female and male figures, a ureteroscope (a thin, tube-like instrument with a light and a lens for viewing) is shown passing through the urethra into the bladder and ureter. In the female figure, the ureteroscope is also shown passing into the renal pelvis. There is also an inset that shows a person lying on an examination table with their knees bent and legs apart, covered by a drape, and a doctor looking at an image of the inside of the ureter and/or renal pelvis on a computer monitor.
- Urine cytology is a laboratory test in which a sample of urine is checked under a microscope for abnormal cells. Cancer in the kidney, bladder, or ureter may shed cancer cells into the urine.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Ultrasound uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound of the abdomen may be done to help diagnose cancer of the renal pelvis and ureter.
- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the pelvis. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Biopsy is the removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for signs of cancer. This may be done during a ureteroscopy or surgery.

### After transitional cell cancer of the renal pelvis and ureter has been diagnosed, tests are done to find out if cancer cells have spread within the renal pelvis and ureter or to other parts of the body.

The process used to find out if the cancer has spread within the renal pelvis and ureter or to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. The results of the diagnostic and staging tests will also help you and your doctor plan treatment.

The following tests and procedures may also be used in the staging process:

- Chest x-ray is an x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.
- PET scan (positron emission tomography scan) uses a small amount of radioactive sugar (also called glucose) that is injected into a vein. Then a scanner is used to make detailed, computerized pictures of areas inside the body where the glucose is taken up. Because cancer cells often take up more glucose than normal cells, the pictures can be used to find cancer cells in the body.
- Bone scan is used to check if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.

### Some people decide to get a second opinion.

You may want to get a second opinion to confirm your cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI’s Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis depends on the stage and grade of the tumor.

The treatment options depend on:

- the stage and grade of the tumor
- where the tumor is
- whether the patient's other kidney is healthy
- whether the cancer has recurred (come back)

Most transitional cell cancer of the renal pelvis and ureter can be cured if found early.

## Stages of Transitional Cell Cancer of the Renal Pelvis and Ureter

Key Points for This Section
- The following stages are used for transitional cell cancer of the renal pelvis and/or ureter:
  - Stage 0 (Noninvasive Papillary Carcinoma and Carcinoma in Situ)
  - Stage I (also called stage 1)
  - Stage II (also called stage 2)
  - Stage III (also called stage 3)
  - Stage IV (also called stage 4)
- Transitional cell cancer of the renal pelvis and ureter is also described as localized, regional, metastatic, or recurrent:
  - Localized
  - Regional
  - Metastatic
  - Recurrent

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It is important to know the stage of transitional cell cancer of the renal pelvis and ureter to plan the best treatment.

There are several staging systems for cancer that describe the extent of the cancer. Transitional cell cancer of the renal pelvis and ureter staging usually uses the TNM staging system. You may see your cancer described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to your cancer. When talking to you about your cancer, your doctor may describe it as one of these stages.

Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

### The following stages are used for transitional cell cancer of the renal pelvis and/or ureter:

#### Stage 0 (Noninvasive Papillary Carcinoma and Carcinoma in Situ)

In stage 0, abnormal cells are found in tissue lining the inside of the renal pelvis or ureter. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 is divided into stages 0a and 0is, depending on the type of tumor:

- Stage 0a is also called noninvasive papillary carcinoma, which may look like long, thin growths that grow out from the tissue lining the inside of the renal pelvis or ureter.
- Stage 0is is also called carcinoma in situ, which is a flat tumor on the tissue lining the inside of the renal pelvis or ureter.

#### Stage I (also called stage 1)

In stage I, cancer has formed and has spread from the tissue lining the inside of the renal pelvis or ureter to the connective tissue layer.

#### Stage II (also called stage 2)

In stage III, cancer has spread to the muscle layer of the renal pelvis or ureter.

#### Stage III (also called stage 3)

In stage III, cancer has spread:

- from the muscle layer of the renal pelvis to fat around the renal pelvis or to tissue in the kidney; or
- from the muscle layer of the ureter to fat around the ureter.

#### Stage IV (also called stage 4)

In stage IV, cancer has spread to at least one of the following:

- a nearby organ.
- lymph nodes.
- other parts of the body, such as the lung, liver, or bone.

Stage IV transitional cell cancer of the renal pelvis and ureter is also called metastatic cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if transitional cell cancer renal pelvis and ureter spreads to the liver, the cancer cells in the liver are actually transitional cell cancer of the renal pelvis and ureter. The disease is called metastatic transitional cell cancer of the renal pelvis and ureter, not liver cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

### Transitional cell cancer of the renal pelvis and ureter is also described as localized, regional, metastatic, or recurrent:

#### Localized

The cancer is found only in the kidney.

#### Regional

The cancer has spread to tissues around the kidney and to nearby lymph nodes and blood vessels in the pelvis.

#### Metastatic

The cancer has spread to other parts of the body.

#### Recurrent

Recurrent cancer is cancer that has recurred (come back) after it has been treated. If transitional cell cancer of the renal pelvis and ureter comes back, it may come back in the renal pelvis, ureter, or in other parts of the body, such as the lung, liver, or bone. Tests will be done to help determine where the cancer has returned. The type of treatment for recurrent transitional cell cancer of the renal pelvis and ureter will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview for Transitional Cell Cancer of the Renal Pelvis and Ureter

Key Points for This Section
- There are different types of treatment for patients with transitional cell cancer of the renal pelvis and ureter.
- The following type of treatment is used:
- New types of treatment are being tested in clinical trials.
  - Fulguration
  - Segmental resection of the renal pelvis
- Treatment for transitional cell cancer of the renal pelvis and ureter may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for patients with transitional cell cancer of the renal pelvis and ureter.

Different types of treatments are available for people with transitional cell cancer of the renal pelvis and ureter. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You’ll want to learn what you need to do before treatment begins, how you’ll feel while going through it, and what kind of help you will need. To learn more, see Questions to Ask Your Doctor about Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

### The following type of treatment is used:

#### Surgery

One of the following surgical procedures may be used to treat transitional cell cancer of the renal pelvis and ureter:

- Nephroureterectomy is surgery to remove the entire kidney, the ureter, and the bladder cuff (tissue that connects the ureter to the bladder). Most people with transitional cell cancer of the renal pelvis and ureter undergo nephroureterectomy.
- Segmental resection of the ureter is a surgical procedure to remove the part of the ureter that contains cancer and some of the healthy tissue around it. The ends of the ureter are then reattached. This treatment is used when the cancer is superficial and in the lower third of the ureter only, near the bladder.

### New types of treatment are being tested in clinical trials.

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

This summary section describes treatments that are being studied in clinical trials. It may not mention every new treatment being studied.

#### Fulguration

Fulguration is a surgical procedure that destroys tissue using an electric current. A tool with a small wire loop on the end is used to remove the cancer or to burn away the tumor with electricity.

#### Segmental resection of the renal pelvis

This is a surgical procedure to remove localized cancer from the renal pelvis without removing the entire kidney. Segmental resection may be done to save kidney function when the other kidney is damaged or has already been removed.

##### Laser surgery

A laser beam (narrow beam of intense light) is used as a knife to remove the cancer. A laser beam can also be used to kill the cancer cells. This procedure may also be called laser fulguration.

##### Regional chemotherapy and regional immunotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping the cells from dividing. To learn more about chemotherapy, see Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

Immunotherapy helps a person’s immune system fight cancer. Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

Regional treatment for transitional cell cancer of renal pelvis and ureter is a method of placing the chemotherapy or immunotherapy drug directly into the renal pelvis or the ureter to mainly affect cancer cells in those areas.

### Treatment for transitional cell cancer of the renal pelvis and ureter may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Localized Transitional Cell Cancer of the Renal Pelvis and Ureter

Treatment of localized transitional cell cancer of the renal pelvis and ureter may include:

- surgery (nephroureterectomy or segmental resection of ureter)
- a clinical trial of fulguration
- a clinical trial of laser surgery
- a clinical trial of segmental resection of the renal pelvis
- a clinical trial of regional chemotherapy or regional immunotherapy

To learn more about these treatments, see the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Regional Transitional Cell Cancer of the Renal Pelvis and Ureter

Treatment of regional transitional cell cancer of the renal pelvis and ureter is usually done in a clinical trial.

To learn more about clinical trials, see the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Metastatic or Recurrent Transitional Cell Cancer of the Renal Pelvis and Ureter

Treatment of metastatic or recurrent transitional cell cancer of the renal pelvis and ureter is usually done in a clinical trial, which may include chemotherapy.

To learn more about clinical trials, see the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Transitional Cell Cancer of the Renal Pelvis and Ureter

For more information from the National Cancer Institute about transitional cell cancer of the renal pelvis and ureter, see:

- Kidney Cancer Home Page (https://www.cancer.gov/types/kidney)
- Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco) (includes help with quitting)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of transitional cell cancer of the renal pelvis and ureter. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/kidney/patient/transitional-cell-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389285]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).